# Sexuality and Reproductive Issues (PDQ®)

Patient Version

This PDQ cancer information summary has current information about sexuality and reproductive issues that cancer patients may experience during or after treatment. It is meant to inform and help patients, families, and caregivers. It does not give formal guidelines or recommendations for making decisions about health care.

Editorial Boards write the PDQ cancer information summaries and keep them up to date. These Boards are made up of experts in cancer treatment and other specialties related to cancer. The summaries are reviewed regularly and changes are made when there is new information. The date on each summary ("Date Last Modified") is the date of the most recent change. The information in this patient summary was taken from the health professional version, which is reviewed regularly and updated as needed, by the PDQ Supportive and Palliative Care Editorial Board.

## Sexual Problems as a Side Effect of Cancer

Key Points for This Section
- Many types of cancer and treatments for cancer can cause sexual side effects.
- Both sexual desire and ability can be affected.
- You and your partner decide what is normal for you.

### Many types of cancer and treatments for cancer can cause sexual side effects.

Many types of cancer and cancer treatments can affect sexual function. These changes may be temporary or permanent. Sexual problems are common in patients with the following types of cancer:

- Breast cancer.
- Gynecologic cancers.
- Prostate cancer.

Less is known about how other types of cancer affect sexuality.

### Both sexual desire and ability can be affected.

The most common sexual problems for cancer patients include the following:

- Loss of desire for sexual activity in both men and women.
- In men, problems getting and keeping an erection.
- In women, pain during intercourse.

Less common problems in men include the following:

- Being unable to ejaculate.
- Ejaculation going backward into the bladder.
- Being unable to reach orgasm.

Less common problems in women include the following:

- Pain or numbness in the genitals.
- Trouble reaching orgasm.

Unlike many other physical side effects of cancer treatment, sexual problems may not get better within the first year or two after cancer treatment. The problems may get worse over time and can get in the way of returning to normal life. That is why it is important to get help with learning to adapt to changes in sexual function.

### You and your partner decide what is normal for you.

Sexuality involves both the body and the mind. "Normal" sexual functioning covers a wide range. You and your partner define what is normal for you. Your "normal" may be affected by the following:

- Gender.
- Age.
- Attitudes about sex.
- Religious values.
- Cultural values.

Sexual function can be an important part of your quality of life. Talk with your doctor if you have problems or concerns about your sexual function. If your doctor cannot talk with you about sexual problems, ask for information from other places or for the name of a doctor who is comfortable talking with you about them.

## Factors Affecting Sexual Function in Cancer Patients

Key Points for This Section
- Certain cancer treatments can affect sexual function.
- Your thoughts and feelings can affect your sexual function.

### Certain cancer treatments can affect sexual function.

#### Surgery

Surgery for the following cancers can cause body changes that have sexual side effects:

- Breast cancer: Sexual function after breast cancer surgery depends on the type of surgery. Compared to surgery to remove the whole breast, surgery to save or reconstruct the breast seems to have little effect on sexual function (including how often women have sex, the ease of reaching orgasm, or overall sexual satisfaction). Women who have surgery to save the breast are more likely to continue to enjoy breast caressing. However, having a mastectomy (surgery to remove part or all of the breast) has been linked to a loss of interest in sex.
- Rectal cancer: Problems with sexual and bladder function are common after surgery for rectal cancer. Surgery for rectal cancer can injure the nerves in the pelvic cavity. Nerves can be damaged when their blood supply is affected or when the nerves are cut. Nerve injury is the main cause of problems with erection, ejaculation, and orgasm.
- Prostate cancer: Surgery for prostate cancer (radical prostatectomy) is being done with newer nerve-sparing techniques. Recovery of erectile function usually happens within a year after having a radical prostatectomy. However, recovery of erectile function after radiation therapy is slow and happens over two or three years. Brachytherapy (internal radiation therapy using radioactive implants) is being used more often to treat prostate cancer. There is less effect on ejaculation and erectile function with brachytherapy alone than when external radiation and/or hormone therapy are added. Many patients have trouble with orgasm after treatment for prostate cancer with radical prostatectomy or radiation therapy. Talk with your doctor about problems with orgasm, changes in penis length, and urinary incontinence during orgasm.
- Testicular cancer: Most studies suggest that problems with sexual function after testicular cancer and its treatment (such as surgery to remove the testicle) are usually short-term. Function usually returns to about the same level as in men who do not have testicular cancer.
- Other pelvic tumors: Men who have surgery to remove the bladder, colon, and/or rectum may get erectile function back sooner if nerve-sparing surgery is used. The sexual side effects of radiation therapy for pelvic tumors are similar to those after prostate cancer treatment. Women who have surgery to remove the uterus, ovaries, bladder, or other organs in the abdomen or pelvis may have pain and loss of sexual function depending on the amount of tissue or organ removed. With counseling and other medical treatments, these patients may get normal sensation back in the vagina and genital areas and be able to have intercourse and reach orgasm without pain.

#### Chemotherapy

For both men and women, chemotherapy is linked to loss of sexual desire and having intercourse less often. Common side effects of chemotherapy can affect your sexual self-image and make you feel unattractive. Side effects may include the following:

- Nausea.
- Vomiting.
- Diarrhea.
- Constipation.
- Mucositis (sores in the mouth from an inflamed lining of the digestive system).
- Losing or gaining weight.
- Losing hair.
- Changes in taste and smell.

In women, chemotherapy can cause the following problems:

- Pain with intercourse.
- Trouble reaching orgasm.
- Decreased estrogen, which can cause the following problems:
  - Vaginal shrinking, thinning, and loss of elasticity (the ability to stretch and then go back to its original shape).
  - Vaginal dryness.
  - Hot flashes.
  - Urinary tract infections.
  - Mood swings.
  - Feeling very tired.
  - Being easily bothered.

Older women who receive chemotherapy have an increased risk of ovarian cancer.

In men, chemotherapy can cause the following problems:

- Loss of sexual desire.
- Problems making testosterone.

#### Radiation therapy

Radiation therapy can cause side effects that may decrease sexual desire. Side effects may include the following:

- Feeling very tired.
- Nausea.
- Vomiting.
- Diarrhea.

In women, radiation therapy to the pelvis can cause changes to the lining of the vagina. The vagina may become narrow and scar tissue may form, which can cause pain with intercourse, painful pelvic exams, infertility, and other long-term problems.

In men, radiation therapy can cause problems getting and keeping an erection. Sexual changes happen slowly over six months to one year after radiation therapy. Men who had problems with erectile dysfunction before getting cancer may be more likely to have sexual problems after being diagnosed and treated for cancer.

Other risk factors in men that cause sexual changes include the following:

- Smoking.
- Heart disease.
- High blood pressure.
- Diabetes.

#### Hormone therapy

Hormone therapy can stop or slow the growth of certain cancers, such as prostate and breast cancer. This is done by using hormones made in a laboratory or other drugs to block the body's natural hormones. However, lower hormone levels can cause sexual problems.

Men who get hormone therapy for prostate cancer may have the following problems:

- Decreased sexual desire.
- Erectile dysfunction.
- Trouble reaching orgasm.

Women older than 45 years who are treated with tamoxifen may have slightly more of the following problems:

- Hot flashes.
- Night sweats.
- Vaginal discharge.
- Vaginal pain.
- Decreased sexual desire.
- Trouble reaching orgasm.

#### Other drug therapy

Drug therapy, such as opioids for pain and drugs to treat depression, can cause sexual side effects. Cancer patients may get drug therapy that affects the nerves, blood vessels, and hormones that control normal sexual function. Drug therapy may also affect their alertness and moods.

### Your thoughts and feelings can affect your sexual function.

#### Misbeliefs

Misbeliefs about cancer might make you confused or unsure about sex when you are recovering from cancer. Common misbeliefs about cancer include the following:

- Past sexual activities caused the cancer.
- Having sex will make the cancer come back.
- Having sex will pass the cancer on to your partner.

Misbeliefs like these can keep you from enjoying sex again. Talk with your doctor to find out the facts so that you can feel more comfortable.

#### Depression

Depression is more common in cancer patients than in people who do not have cancer. Common symptoms of depression include loss of sexual desire and a decrease in sexual pleasure. Treatment for depression may lessen your sexual problems. (See the PDQ summary on Depression for more information.)

#### Self-image

Cancer and cancer treatment may cause physical changes, such as hair loss or weight gain from chemotherapy or body changes from surgery. You may not like how you look and you may not want to have sex. Let your health care team know your concerns. You can get help adjusting to body changes caused by cancer and its treatment.

Patients with colostomies or ileostomies need to find a sexual position that does not place weight on the ostomy. Information is available from national organizations related to sexual function.and ostomates.

#### Stress

The stress of cancer diagnosis and treatment can make relationship problems that you already have even worse. Your sexual relationship can also be affected. Patients who do not have a committed relationship may stop dating because they fear being rejected when a new partner finds out they have cancer. Your feelings about your sexuality before being diagnosed with cancer will affect adjustment after cancer treatment. If you had positive feelings about sex, you may be more likely to continue sex after cancer treatment. Cancer can be hard on any relationship. It is important to get help if stress is causing a problem for you.

## Assessing Sexual Function in Cancer Patients

Key Points for This Section
- Your doctor will talk with you to find out what may be causing your sexual problems and how these problems affect your life.
- Your doctor may ask questions about your relationship with your partner.
- Your doctor may also ask you about your lifestyle.
- Sexual assessment may include a physical exam and other tests.

### Your doctor will talk with you to find out what may be causing your sexual problems and how these problems affect your life.

As part of the assessment, your doctor will talk with you alone or with both you and your partner. You may be asked the following questions:

- Do you have any problems or concerns related to sexuality?
- How often do you feel a desire to have sex?
- Do you enjoy sex?
- Do you have enough energy for sex?
- Do you become sexually aroused (for men, are you able to get and keep an erection, or for women, does your vagina expand and become lubricated)?
- Are you able to reach orgasm during sex? What types of stimulation can cause an orgasm (for example, self-touch, use of a vibrator, shower massage, partner caressing, oral stimulation, or intercourse)?
- Do you have pain during sex? Where do you feel the pain? What does the pain feel like? What kinds of sexual activity cause pain? Does this cause pain every time? How long does the pain last?
- When did your sexual problems begin? Was it around the same time that you were diagnosed with cancer or had cancer treatment? Did you have sexual problems before you were diagnosed with cancer?
- Are you taking any medicines? Did you start taking any new medicines or did the doctor change the dose of any medicines around the time that your sexual problems started?

### Your doctor may ask questions about your relationship with your partner.

You may be asked the following questions if you have a partner:

- How long were you with your partner before you were diagnosed with cancer?
- How stable was your relationship?
- How did your partner react when you were diagnosed with cancer?
- Are you concerned about how your partner may be affected by your treatment?

You and your partner may have sexual problems and concerns and fears about your relationship. It is important that you and your partner talk about these things with a doctor you feel comfortable with.

### Your doctor may also ask you about your lifestyle.

You may be asked the following questions about your lifestyle:

- Do you smoke? If yes, how much and how often do you smoke? If no, have you smoked in the past?
- Do you drink alcohol? If yes, how much and how often?
- Do you take prescription or over-the-counter medicines? If yes, what kinds and how much?

### Sexual assessment may include a physical exam and other tests.

The following tests and procedures may be done:

- Physical exam and history: An exam of the body to check general signs of health, including checking for signs of disease, such as lumps or anything else that seems unusual. A history of the patient’s health habits and past illnesses and treatments will also be taken.
- Blood tests: Tests done on a sample of blood to measure the amount of certain substances in the blood or to count different types of blood cells. Blood tests may be done to look for signs of disease or agents that cause disease, to check for antibodies or tumor markers, or to see how well treatments are working.
- Ultrasound exam: A procedure in which high-energy sound waves (ultrasound) are bounced off internal tissues or organs and make echoes. The echoes form a picture of body tissues called a sonogram. The picture can be printed to be looked at later.
- Measurement of nighttime erections: A test to check whether a man is having erections during sleep. If there are good erections during sleep, there is probably no physical cause for his erection problems. Nighttime erections are measured during sleep using the following:
  - Snap gauge: A device made of plastic rings fitted around the penis, which break when there is an erection.
  - Electronic monitoring: A device that records the number of erections that occur and how long and rigid they are.
- Blood hormone studies: A procedure in which a blood sample is checked to measure the amounts of certain hormones released into the blood by organs and tissues in the body. An unusual (higher- or lower-than-normal) amount of a substance can be a sign of disease in the organ or tissue that makes it.

## Treatment of Sexual Problems in Cancer Patients

Key Points for This Section
- Good communication can help you and your partner continue sex after cancer treatment.
- You can learn ways to adapt to changes in sexual function.
- Counseling may make it easier for you to cope with changes in your body and your sex life after cancer.
- Medical treatments may help improve sexual function.

### Good communication can help you and your partner continue sex after cancer treatment.

You may be afraid or anxious about having sex after cancer treatment. Fear and anxiety can cause you to avoid intimacy, touch, and sexual activity. Your partner may also be afraid and anxious that starting sexual activity will make you feel pressured or cause you pain. Even when a couple has been together a long time, talking about these things is important. Honest communication of feelings, concerns, and preferences can help.

### You can learn ways to adapt to changes in sexual function.

Health professionals who specialize in treating sexual problems can give you the names of organizations that offer support. They can also tell you about educational materials such as Internet sources, books, pamphlets, and DVDs. These resources can help you learn ways to adapt to changes in sexual function.

### Counseling may make it easier for you to cope with changes in your body and your sex life after cancer.

Sexual counseling may help you. Counseling may be for you alone, with you and your partner, or in a group.

### Medical treatments may help improve sexual function.

You may be helped by medical treatments such as hormone replacement, drugs, medical devices, or surgery.

## Fertility Issues

Key Points for This Section
- Cancer treatments may cause infertility.
- If you are concerned about your ability to have children, find out what you can do before treatment.
- Chemotherapy can affect fertility.
- Radiation therapy to the abdomen or pelvis can cause infertility.

### Cancer treatments may cause infertility.

Radiation therapy and chemotherapy may cause infertility (being unable to have children). This may be temporary or permanent. The risk of infertility as a side effect of cancer treatment depends on the following:

- Gender.
- Age at time of treatment.
- Type and dose of radiation therapy and/or chemotherapy.
- Where in the body the radiation is given.
- Whether you had one type of therapy or more than one.
- How long ago you had treatment.

Ask your doctor if your cancer or its treatment may cause infertility or sexual side effects. Your doctor can tell you what changes may happen. A child may be too young to understand issues about infertility or sexuality. Parents can decide what they want their child to know about these issues.

### If you are concerned about your ability to have children, find out what you can do before treatment.

Talk to your doctor before treatment if you are concerned about the effects of cancer treatment on your ability to have children. Your doctor can recommend a counselor or fertility specialist who can tell you your options and help you and your partner make a decision. Options may include freezing sperm, eggs, or ovarian tissue before cancer treatment.

### Chemotherapy can affect fertility.

The following chemotherapy agents have been shown to affect fertility:

- Busulfan.
- Melphalan.
- Cyclophosphamide.
- Cisplatin.
- Chlorambucil.
- Ifosfamide.
- Mustine.
- Carmustine.
- Lomustine.
- Vinblastine.
- Cytarabine.
- Nitrosoureas.
- Procarbazine.

Fertility is likely to get better the longer you have been off chemotherapy. If you are taking chemotherapy, your age is an important factor. In women older than 40 years, adjuvant hormone therapy increases the risk that chemotherapy will cause infertility.

### Radiation therapy to the abdomen or pelvis can cause infertility.

A man's age and the amount of radiation given directly to the testicles affects his risk of infertility. Lower doses of radiation and using lead shields to protect the testicles can help men keep their fertility. Sperm counts usually take 10 to 24 months to return to the level they were before radiation therapy. Usually, the higher the radiation dose, the longer it takes to recover. If the body is not making hormones normally, hormone therapy may help restore fertility. Radiation given to boys who have not reached puberty can cause problems with fertility.

Radiation therapy to the ovaries may cause infertility in women of any age. High doses of radiation in women younger than 26 years may cause early menopause. Lower doses of radiation can cause infertility in women older than 40 years. Regaining fertility is more likely if radiation to the ovaries is given before puberty. Doctors are sometimes able to protect the ovaries during radiation therapy.

## Current Clinical Trials

Check the list of NCI-supported cancer clinical trials for supportive and palliative care trials about sexuality and reproductive issues (http://www.cancer.gov/search/ClinicalTrialsLink.aspx?Diagnosis=37817&tt=2&format=1), sexual dysfunction (http://www.cancer.gov/search/ClinicalTrialsLink.aspx?Diagnosis=41403&tt=2&format=1), fertility assessment and management (http://www.cancer.gov/search/ClinicalTrialsLink.aspx?idtype=5&id=40782&tt=2&format=1) and cryopreservation (http://www.cancer.gov/search/ClinicalTrialsLink.aspx?idtype=5&id=549866&tt=2&format=1) that are now accepting participants. For more specific results, refine the search by using other search features, such as the location of the trial, the type of treatment, or the name of the drug.

General information about clinical trials is also available from the NCI website (http://www.cancer.gov/about-cancer/treatment/clinical-trials).

## About This PDQ Summary

### About PDQ

Physician Data Query (PDQ) is the National Cancer Institute's (NCI's) comprehensive cancer information database. The PDQ database contains summaries of the latest published information on cancer prevention, detection, genetics, treatment, supportive care, and complementary and alternative medicine. Most summaries come in two versions. The health professional versions have detailed information written in technical language. The patient versions are written in easy-to-understand, nontechnical language. Both versions have cancer information that is accurate and up to date and most versions are also available in Spanish (http://www.cancer.gov/espanol/publicaciones/pdq).

PDQ is a service of the NCI. The NCI is part of the National Institutes of Health (NIH). NIH is the federal government’s center of biomedical research. The PDQ summaries are based on an independent review of the medical literature. They are not policy statements of the NCI or the NIH.

### Purpose of This Summary

This PDQ cancer information summary has current information about sexuality and reproductive issues that cancer patients may experience during or after treatment. It is meant to inform and help patients, families, and caregivers. It does not give formal guidelines or recommendations for making decisions about health care.

### Reviewers and Updates

Editorial Boards write the PDQ cancer information summaries and keep them up to date. These Boards are made up of experts in cancer treatment and other specialties related to cancer. The summaries are reviewed regularly and changes are made when there is new information. The date on each summary ("Date Last Modified") is the date of the most recent change.

The information in this patient summary was taken from the health professional version, which is reviewed regularly and updated as needed, by the PDQ Supportive and Palliative Care Editorial Board (http://www.cancer.gov/publications/pdq/editorial-boards/supportive-care).

### Clinical Trial Information

A clinical trial is a study to answer a scientific question, such as whether one treatment is better than another. Trials are based on past studies and what has been learned in the laboratory. Each trial answers certain scientific questions in order to find new and better ways to help cancer patients. During treatment clinical trials, information is collected about the effects of a new treatment and how well it works. If a clinical trial shows that a new treatment is better than one currently being used, the new treatment may become "standard." Patients may want to think about taking part in a clinical trial. Some clinical trials are open only to patients who have not started treatment.

Clinical trials are listed in PDQ and can be found online at NCI's website (http://www.cancer.gov/about-cancer/treatment/clinical-trials). Many cancer doctors who take part in clinical trials are also listed in PDQ. For more information, call the Cancer Information Service 1-800-4-CANCER (1-800-422-6237).

### Permission to Use This Summary

PDQ is a registered trademark. The content of PDQ documents can be used freely as text. It cannot be identified as an NCI PDQ cancer information summary unless the whole summary is shown and it is updated regularly. However, a user would be allowed to write a sentence such as “NCI’s PDQ cancer information summary about breast cancer prevention states the risks in the following way: [include excerpt from the summary].”

The best way to cite this PDQ summary is:

National Cancer Institute: PDQ® Sexuality and Reproductive Issues. Bethesda, MD: National Cancer Institute. Date last modified <MM/DD/YYYY>. Available at: http://www.cancer.gov/about-cancer/treatment/side-effects/sexuality-fertility-women/sexuality-pdq. Accessed <MM/DD/YYYY>.

Images in this summary are used with permission of the author(s), artist, and/or publisher for use in the PDQ summaries only. If you want to use an image from a PDQ summary and you are not using the whole summary, you must get permission from the owner. It cannot be given by the National Cancer Institute. Information about using the images in this summary, along with many other images related to cancer can be found in Visuals Online (http://visualsonline.cancer.gov/). Visuals Online is a collection of more than 2,000 scientific images.

### Disclaimer

The information in these summaries should not be used to make decisions about insurance reimbursement. More information on insurance coverage is available on Cancer.gov on the Managing Cancer Care (http://www.cancer.gov/about-cancer/managing-care) page.

### Contact Us

More information about contacting us or receiving help with the Cancer.gov website can be found on our Contact Us for Help (http://www.cancer.gov/contact) page. Questions can also be submitted to Cancer.gov through the website’s E-mail Us (http://www.cancer.gov/contact/email-us).